# Childhood Liver Cancer Treatment

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood liver cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## Hepatoblastoma

Hepatoblastoma is a cancer that forms in the tissues of the liver. It is the most common type of childhood liver cancer and usually affects children younger than 3 years of age.

The liver is one of the largest organs in the body. It has two lobes and fills the upper right side of the abdomen inside the rib cage. Three of the many important functions of the liver are:

- to make bile to help digest fats from food
- to store glycogen (sugar), which the body uses for energy
- to filter harmful substances from the blood so they can be passed from the body in stools and urine

Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).

Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.

In hepatoblastoma, the histology (how the cancer cells look under a microscope) affects the way the cancer is treated. The histology for hepatoblastoma includes:

- well-differentiated fetal (pure fetal) histology
- small cell undifferentiated histology hepatoblastoma and rhabdoid tumors of the liver
- mixed epithelial and fetal histology (non–well-differentiated fetal histology, non-small cell undifferentiated histology)

### Causes and risk factors for hepatoblastoma

Hepatoblastoma is caused by certain changes in the way the liver cells function, especially how they grow and divide into new cells. Often, the exact cause of these changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop hepatoblastoma. And it will develop in some children who don't have a known risk factor.

The following syndromes or conditions are risk factors for hepatoblastoma:

- Aicardi syndrome
- Beckwith-Wiedemann syndrome
- hemihyperplasia
- familial adenomatous polyposis (FAP)
- glycogen storage disease
- premature birth with a very low weight at birth
- Simpson-Golabi-Behmel syndrome
- certain genetic changes, such as trisomy 18

Talk with your child's doctor if you think your child may be at risk.

### Monitoring children at risk of hepatoblastoma

Children with Beckwith-Wiedemann syndrome, hemihyperplasia, Simpson-Golabi-Behmel syndrome, and trisomy 18 may have tests done to check for cancer before any symptoms appear. These tests may help find cancer early and improve your child's chance of survival.

Children at risk of developing hepatoblastoma have an abdominal ultrasound exam every 3 months from birth (or diagnosis of a risk factor) until they are 4 years old. They also have blood tests to check the level of alpha-fetoprotein (AFP).

### Symptoms of hepatoblastoma

Children may not have symptoms of hepatoblastoma until the tumor has grown bigger. It's important to check with your child's doctor if your child has:

- a lump in the abdomen
- swelling in the abdomen
- pain in the abdomen
- weight loss for no known reason
- loss of appetite
- nausea and vomiting

These symptoms may be caused by problems other than hepatoblastoma. The only way to know is for your child to see a doctor.

### Tests to diagnose hepatoblastoma

If your child has symptoms that suggest hepatoblastoma, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Based on these results, the doctor may recommend other tests. If your child is diagnosed with hepatoblastoma, the results of these tests will also help you and your child's doctor plan treatment.

The tests used to diagnose hepatoblastoma may include:

#### Serum tumor marker test

Serum tumor marker tests measure the amounts of certain substances released into the blood by organs, tissues, or tumor cells in the body. Certain substances are linked to specific types of cancer when found in increased levels in the blood. These are called tumor markers. The blood of children who have liver cancer may have increased amounts of a hormone called beta-human chorionic gonadotropin (beta-hCG) or a protein called AFP. Other cancers, benign liver tumors, and certain noncancer conditions, including cirrhosis and hepatitis, can also increase AFP levels.

#### SMARCB1 gene testing

SMARCB1 gene testing is a laboratory test in which a sample of blood or tissue is tested for certain changes in the SMARCB1 gene.

#### Complete blood count (CBC)

A CBC checks a sample of blood for:

- the number of red blood cells, white blood cells, and platelets
- the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
- the portion of the blood sample made up of red blood cells

#### Liver function tests

Liver function tests measure the amounts of certain substances released into the blood by the liver. A higher-than-normal amount of a substance can be a sign of liver damage or cancer.

#### Blood chemistry studies

Blood chemistry studies measure the amounts of certain substances, such as bilirubin or lactate dehydrogenase (LDH), released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.

#### Magnetic resonance imaging (MRI) with gadolinium

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the liver. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear MRI.

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

#### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.

A CT scan of the chest and abdomen is usually done to help diagnose childhood liver cancer.

Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

#### Ultrasound exam

An ultrasound exam is a procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. An ultrasound exam of the abdomen to check the large blood vessels is usually done to help diagnose childhood liver cancer.

Abdominal ultrasound. An ultrasound transducer connected to a computer is pressed against the skin of the abdomen. The transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).

Abdominal ultrasound; drawing shows a child lying on an exam table during an abdominal ultrasound procedure. A technician is shown pressing a transducer (a device that makes sound waves that bounce off tissues inside the body) against the skin of the abdomen. A computer screen shows a sonogram (picture).

#### Chest x-ray

An x-ray is a type of high-energy radiation that can go through the body and make pictures. A chest x-ray is one that makes pictures of the lungs.

#### Biopsy

Biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for cancer. The doctor may remove as much tumor as safely possible during the same biopsy procedure.

#### Immunohistochemistry

Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to check for a certain gene mutation, to help diagnose cancer, and to help tell one type of cancer from another type of cancer. This test may be used to look for changes in the INI1 gene.

### Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans before giving a recommendation. They may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your appointments, visit Questions to Ask Your Doctor (https://www.cancer.gov/about-cancer/coping/questions).

### Prognostic factors for hepatoblastoma

If your child has been diagnosed with hepatoblastoma, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis for hepatoblastoma depends on:

- whether the cancer has spread throughout the liver
- the size of the tumor
- whether the type of hepatoblastoma is well-differentiated fetal (pure fetal) or small cell undifferentiated histology
- whether the cancer has spread to other places in the body, such as the diaphragm, lungs, or certain large blood vessels
- whether there is more than one tumor in the liver
- whether the outer covering around the tumor has broken open
- how the cancer responds to chemotherapy
- whether the cancer can be removed completely by surgery
- whether your child can have a liver transplant
- whether the AFP blood levels go down after treatment
- your child's age
- whether the cancer has just been diagnosed or has come back after treatment

For hepatoblastoma that comes back after initial treatment, the prognosis depends on:

- where in the body the tumor recurred
- the type of treatment used to treat the initial cancer

Hepatoblastoma may be cured if the tumor is small and can be completely removed by surgery.

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Stages of hepatoblastoma

Cancer stage describes the extent of cancer in the body, especially whether the cancer has spread from where it first formed to other parts of the body.

In hepatoblastoma, the PRETEXT and POSTTEXT groups are used instead of stage to plan treatment. The results of the tests and procedures done to detect, diagnose, and find out whether the cancer has spread are used to determine the PRETEXT and POSTTEXT groups.

Two grouping systems are used for hepatoblastoma to decide whether the tumor can be removed by surgery:

- The PRETEXT group describes the tumor before the patient has any treatment.
- The POSTTEXT group describes the tumor after the patient has had treatment such as neoadjuvant chemotherapy.

The liver is divided into four sections for the two grouping systems. The PRETEXT and POSTTEXT groups depend on which sections of the liver have cancer. There are four PRETEXT and POSTTEXT groups.

#### PRETEXT and POSTTEXT group I

Liver PRETEXT and POSTTEXT I. Cancer is found in one section of the liver. Three sections of the liver that are next to each other do not have cancer in them.

Liver PRETEXT and POSTTEXT I; drawing shows two livers. Dotted lines divide each liver into four vertical sections of about the same size. In the first liver, cancer is shown in the section on the far left. In the second liver, cancer is shown in the section on the far right.

In group I, the cancer is found in one section of the liver. Three sections of the liver that are next to each other do not have cancer in them.

#### PRETEXT and POSTTEXT group II

Liver PRETEXT and POSTTEXT II. Cancer is found in one or two sections of the liver. Two sections of the liver that are next to each other do not have cancer in them.

Liver PRETEXT and POSTTEXT II; drawing shows five livers. Dotted lines divide each liver into four vertical sections that are about the same size. In the first liver, cancer is shown in the two sections on the left. In the second liver, cancer is shown in the two sections on the right. In the third liver, cancer is shown in the far left and far right sections. In the fourth liver, cancer is shown in the second section from the left. In the fifth liver, cancer is shown in the second section from the right.

In group II, cancer is found in one or two sections of the liver. Two sections of the liver that are next to each other do not have cancer in them.

#### PRETEXT and POSTTEXT group III

Liver PRETEXT and POSTTEXT III. Cancer is found in three sections of the liver and one section does not have cancer in it, or cancer is found in two sections of the liver and two sections that are not next to each other do not have cancer in them.

Liver PRETEXT and POSTTEXT III; drawing shows seven livers. Dotted lines divide each liver into four vertical sections that are about the same size. In the first liver, cancer is shown in three sections on the left. In the second liver, cancer is shown in the two sections on the left and the section on the far right. In the third liver, cancer is shown in the section on the far left and the two sections on the right. In the fourth liver, cancer is shown in three sections on the right. In the fifth liver, cancer is shown in the two middle sections. In the sixth liver, cancer is shown in the section on the far left and in the second section from the right. In the seventh liver, cancer is shown in the section on the far right and in the second section from the left.

In group III, one of the following is true:

- Cancer is found in three sections of the liver, and one section does not have cancer.
- Cancer is found in two sections of the liver, and two sections that are not next to each other do not have cancer in them.

#### PRETEXT and POSTTEXT group IV

Liver PRETEXT and POSTTEXT IV. Cancer is found in all four sections of the liver.

Liver PRETEXT and POSTTEXT IV; drawing shows two livers. Dotted lines divide each liver into four vertical sections that are about the same size. In the first liver, cancer is shown across all four sections. In the second liver, cancer is shown in the two sections on the left and spots of cancer are shown in the two sections on the right.

In group IV, cancer is found in all four sections of the liver.

### Progressive and recurrent hepatoblastoma

Hepatoblastoma can be a progressive or refractory disease. Progressive hepatoblastoma is cancer that continues to grow, spread, or worsen. Refractory hepatoblastoma is cancer that no longer responds to treatment.

Recurrent hepatoblastoma is cancer that has recurred (come back) after it has been treated. The cancer may come back in the liver or as metastatic tumors in other parts of the body. Tests will be done to help determine where the cancer has returned in the body, if it has spread, and how far. The type of treatment that your child will have for recurrent hepatoblastoma will depend on how far it has spread.

Learn more at Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer).

### Types of treatment for hepatoblastoma

There are different types of treatment for children and adolescents with hepatoblastoma. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of hepatoblastoma. The pediatric oncologist works with other health care providers who are experts in treating children with hepatoblastoma and who specialize in certain areas of medicine. It is especially important to have a pediatric surgeon with experience in liver surgery who can send patients to a liver transplant program if needed.

Other specialists may include:

- pediatrician
- radiation oncologist
- pathologist
- pediatric nurse specialist
- rehabilitation specialist
- psychologist
- social worker
- nutritionist
- child-life specialist
- fertility specialist

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

#### Surgery

When possible, the cancer is removed by surgery. The types of surgery that may be done are:

- Partial hepatectomy is surgery to remove the part of the liver where cancer is found. The part removed may be a wedge of tissue, an entire lobe, or a larger part of the liver, along with a small amount of normal tissue around it.
- Liver transplant is the removal of the entire liver by surgery, followed by a transplant of a healthy liver from a donor. A liver transplant may be possible when cancer has not spread beyond the liver, and a donated liver can be found. If the patient has to wait for a donated liver, other treatment is given as needed.
- Resection of metastases is surgery to remove cancer that has spread outside of the liver, such as to nearby tissues, the lungs, or the brain.

The type of surgery that can be done depends on:

- the PRETEXT group and POSTTEXT group
- the size of the primary tumor
- whether there is more than one tumor in the liver
- whether the cancer has spread to nearby large blood vessels
- the level of AFP in the blood
- whether the tumor can be shrunk by chemotherapy, so that it can be removed by surgery
- whether a liver transplant is needed

Chemotherapy is sometimes given before surgery to shrink the tumor and make it easier to remove. This is called neoadjuvant therapy.

After the doctor removes all the cancer that can be seen at the time of the surgery, some patients may be given chemotherapy or radiation therapy to kill any cancer cells that are left. Treatment given after the surgery to lower the risk that the cancer will come back is called adjuvant therapy.

#### Watchful waiting

Watchful waiting is closely monitoring a patient's condition without giving any treatment until signs or symptoms appear or change. In hepatoblastoma, this treatment is only used for small well-differentiated fetal (pure fetal) histology tumors that have been completely removed by surgery.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment, such as radiation therapy.

There are two ways to give chemotherapy to treat hepatoblastoma:

- Systemic chemotherapy is chemotherapy that is injected into a vein. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body.
- Regional chemotherapy is chemotherapy that is placed directly into the cerebrospinal fluid, an organ, or a body cavity such as the abdomen. When given this way, the drugs mainly affect cancer cells in those areas.
  Chemoembolization of the hepatic artery (the main artery that supplies blood to the liver) is a type of regional chemotherapy used to treat hepatoblastoma that cannot be removed by surgery. The anticancer drug is injected into the hepatic artery through a catheter (thin tube). The drug is mixed with a substance that blocks the artery, cutting off blood flow to the tumor. Most of the anticancer drug is trapped near the tumor, and only a small amount of the drug reaches other parts of the body. The blockage may be temporary or permanent, depending on the substance used to block the artery. The tumor is prevented from getting the oxygen and nutrients it needs to grow. The liver continues to receive blood from the hepatic portal vein, which carries blood from the stomach and intestine to the liver. This procedure is also called transarterial chemoembolization, or TACE.

Chemotherapy drugs used alone or in combination to treat hepatoblastoma include:

- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- fluorouracil (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil) (5-FU)
- ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
- irinotecan (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. The way the radiation therapy is given depends on the type of cancer being treated and the PRETEXT or POSTTEXT group.

Hepatoblastoma may be treated with external beam radiation therapy or internal radiation therapy:

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. External radiation therapy is used to treat hepatoblastoma that cannot be removed by surgery or has spread to other parts of the body.
- Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.
  Radioembolization is a type of internal radiation therapy used to treat hepatoblastoma. A very small amount of a radioactive substance is attached to tiny beads that are injected into the hepatic artery (the main artery that supplies blood to the liver) through a thin tube called a catheter. The beads are mixed with a substance that blocks the artery, cutting off blood flow to the tumor. Most of the radiation is trapped near the tumor to kill the cancer cells. This is done to shrink the tumor or to relieve symptoms and improve quality of life for children with hepatoblastoma.

Learn more about radiation therapy and its side effects at External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Radiofrequency ablation therapy

Radiofrequency ablation uses needles inserted directly through the skin or through an incision in the abdomen to reach the tumor. High-energy radio waves heat the needles and tumor, which kills cancer cells. Radiofrequency ablation is being used to treat recurrent hepatoblastoma.

#### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of newly diagnosed hepatoblastoma

Treatment of newly diagnosed hepatoblastoma that can be removed by surgery at the time of diagnosis may include:

- surgery to remove the tumor, followed by combination chemotherapy, for hepatoblastoma that is mixed epithelial and fetal histology (not well-differentiated fetal histology) or aggressive chemotherapy for small cell undifferentiated histology
- surgery to remove the tumor, followed by watchful waiting or chemotherapy, for hepatoblastoma with well-differentiated fetal histology

Treatment of newly diagnosed hepatoblastoma that cannot be removed by surgery or is not removed at the time of diagnosis may include:

- combination chemotherapy to shrink the tumor, followed by surgery to remove the tumor
- combination chemotherapy, followed by a liver transplant
- chemoembolization or radioembolization of the hepatic artery to shrink the tumor, followed by surgery to remove the tumor

For newly diagnosed hepatoblastoma that has spread to other parts of the body at the time of diagnosis, combination chemotherapy is given to shrink the tumors in the liver and cancer that has spread to other parts of the body. After chemotherapy, imaging tests are done to check whether the tumors can be removed by surgery.

Treatment may include:

- if the tumors in the liver and other parts of the body (usually nodules in the lung) can be removed, surgery will be done to remove the tumors, followed by chemotherapy to kill any cancer cells that may remain
- if the tumor in other parts of the body cannot be removed, or a liver transplant is not possible, chemotherapy, chemoembolization or radioembolization of the hepatic artery, or radiation therapy may be given
- if the tumor in other parts of the body cannot be removed, or the patient does not want surgery, radiofrequency ablation may be given

### Treatment of progressive or recurrent hepatoblastoma

Treatment of progressive or recurrent hepatoblastoma may include:

- surgery to remove isolated (single and separate) metastatic tumors with or without chemotherapy
- radiofrequency ablation
- combination chemotherapy
- liver transplant

### Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of treatment may include:

- physical problems that affect liver function or hearing
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the long-term effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer or to find out the treatment group may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed, or if the cancer has recurred (come back).

To learn more about follow-up tests, visit Tests to diagnose hepatoblastoma (https://www.cancer.gov/types/liver/childhood-liver-cancer/hepatoblastoma#_16).

### Coping with your child's cancer

When a child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Childhood Hepatocellular Carcinoma

Childhood hepatocellular carcinoma is a rare type of cancer that forms in liver cells called hepatocytes. Hepatocytes are the most common cells of the liver, and they carry out most of the functions of the liver.

The liver is one of the largest organs in the body. It has two lobes and fills the upper right side of the abdomen inside the rib cage. Three of the many important functions of the liver are:

- to make bile to help digest fats from food
- to store glycogen (sugar), which the body uses for energy
- to filter harmful substances from the blood so they can be passed from the body in stools and urine

Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).

Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.

Childhood hepatocellular carcinoma usually affects older children and adolescents. It is more common in areas of Asia that have higher rates of hepatitis B virus infection than in the United States.

Hepatocellular carcinoma is the most common type of liver cancer in adults. Risk factors, staging, and treatment for children are different than for adults. Learn more about hepatocellular carcinoma in adults at What Is Liver Cancer? (https://www.cancer.gov/types/liver/what-is-liver-cancer)

### Causes and risk factors for childhood hepatocellular carcinoma

Childhood hepatocellular carcinoma is caused by certain changes in the way liver cells function, especially how they grow and divide into new cells. Often, the exact cause of these cell changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop hepatocellular carcinoma. And it will develop in some children who don't have a known risk factor.

The following syndromes or conditions are risk factors for childhood hepatocellular carcinoma:

- Alagille syndrome.
- Glycogen storage disease.
- Hepatitis B virus infection that was passed from mother to child at birth.
- Progressive familial intrahepatic disease.
- Tyrosinemia. Some patients with tyrosinemia are diagnosed with hepatocellular carcinoma after receiving a liver transplant, before there are signs or symptoms of cancer.

Hepatocellular carcinoma may develop in children with no underlying liver disease.

Talk with your child's doctor if you think your child may be at risk.

### Symptoms of childhood hepatocellular carcinoma

Children may not have symptoms of hepatocellular carcinoma until the tumor has grown bigger. It's important to check with your child's doctor if your child has:

- a lump in the abdomen
- swelling in the abdomen
- abdominal pain
- weight loss for no known reason
- loss of appetite
- nausea and vomiting

These symptoms may be caused by problems other than hepatocellular carcinoma. The only way to know is to see your child's doctor.

### Tests to diagnose childhood hepatocellular carcinoma

If your child has symptoms that suggest hepatocellular carcinoma, the doctor will need to find out if these are due to cancer or to another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Based on these results, the doctor may recommend other tests. If your child is diagnosed with hepatocellular carcinoma, the results of these tests will also help you and your child's doctor plan treatment.

The tests used to diagnose hepatocellular carcinoma in children may include:

#### Serum tumor marker test

Serum tumor marker tests measure the amounts of certain substances released into the blood by organs, tissues, or tumor cells in the body. Certain substances are linked to specific types of cancer when found in increased levels in the blood. These are called tumor markers. The blood of children who have liver cancer may have increased amounts of a hormone called beta-human chorionic gonadotropin (beta-hCG) or a protein called alpha-fetoprotein (AFP). Other cancers, benign liver tumors, and certain noncancer conditions, including cirrhosis and hepatitis, can also increase AFP levels.

#### Complete blood count (CBC)

A CBC checks a sample of blood for:

- the number of red blood cells, white blood cells, and platelets
- the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
- the portion of the blood sample made up of red blood cells

#### Liver function tests

Liver function tests measure the amounts of certain substances released into the blood by the liver. A higher-than-normal amount of a substance can be a sign of liver damage or cancer.

#### Blood chemistry studies

Blood chemistry studies measure the amounts of certain substances, such as bilirubin or lactate dehydrogenase (LDH), released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.

#### Hepatitis panel

A hepatitis panel checks for antigens or antibodies in the blood to see if there is or has been a hepatitis infection.

#### Magnetic resonance imaging (MRI) with gadolinium

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the liver. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells, so they show up brighter in the picture. This procedure is also called nuclear MRI.

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

#### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.

A CT scan of the chest and abdomen is usually done to help diagnose childhood liver cancer.

Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

#### Ultrasound exam

An ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. An ultrasound exam of the abdomen to check the large blood vessels is usually done to help diagnose childhood liver cancer.

Abdominal ultrasound. An ultrasound transducer connected to a computer is pressed against the skin of the abdomen. The transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).

Abdominal ultrasound; drawing shows a child lying on an exam table during an abdominal ultrasound procedure. A technician is shown pressing a transducer (a device that makes sound waves that bounce off tissues inside the body) against the skin of the abdomen. A computer screen shows a sonogram (picture).

#### Chest x-ray

An x-ray is a type of high-energy radiation that can go through the body onto film, making a picture of areas inside the body. A chest x-ray is one that makes pictures of the lungs.

#### Biopsy

Biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for cancer. The doctor may remove as much tumor as safely possible during the same biopsy procedure.

#### Immunohistochemistry

Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type.

### Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans before giving a recommendation. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, visit Questions to Ask Your Doctor (https://www.cancer.gov/about-cancer/coping/questions).

### Prognostic factors for childhood hepatocellular carcinoma

If your child has been diagnosed with hepatocellular carcinoma, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis for childhood hepatocellular carcinoma depends on:

- whether the cancer has spread throughout the liver
- whether the cancer can be removed completely by surgery
- whether the cancer has spread to other places in the body, such as the lungs
- how the cancer responds to chemotherapy
- whether your child has hepatitis B virus infection
- whether the cancer has just been diagnosed or has come back after treatment

For childhood hepatocellular carcinoma that recurs (comes back) after initial treatment, the prognosis depends on:

- where in the body the tumor recurred
- the type of treatment used to treat the initial cancer

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Stages of childhood hepatocellular carcinoma

The cancer stage describes the extent of cancer in the body, especially whether the cancer has spread from where it first formed to other parts of the body.

In childhood hepatocellular carcinoma, the PRETEXT and POSTTEXT groups are used to plan treatment. The results of the tests and procedures done to detect, diagnose, and find out whether the cancer has spread are used to determine the PRETEXT and POSTTEXT groups.

Two grouping systems are used for childhood hepatocellular carcinoma to decide whether the tumor can be removed by surgery:

- The PRETEXT group describes the tumor before the patient has any treatment.
- The POSTTEXT group describes the tumor after the patient has had treatment such as neoadjuvant chemotherapy.

The liver is divided into four sections for the two grouping systems. The PRETEXT and POSTTEXT groups depend on which sections of the liver have cancer. There are four PRETEXT and POSTTEXT groups.

#### PRETEXT and POSTTEXT group I

Liver PRETEXT and POSTTEXT I. Cancer is found in one section of the liver. Three sections of the liver that are next to each other do not have cancer in them.

Liver PRETEXT and POSTTEXT I; drawing shows two livers. Dotted lines divide each liver into four vertical sections of about the same size. In the first liver, cancer is shown in the section on the far left. In the second liver, cancer is shown in the section on the far right.

In group I, the cancer is found in one section of the liver. Three sections of the liver that are next to each other do not have cancer in them.

#### PRETEXT and POSTTEXT group II

Liver PRETEXT and POSTTEXT II. Cancer is found in one or two sections of the liver. Two sections of the liver that are next to each other do not have cancer in them.

Liver PRETEXT and POSTTEXT II; drawing shows five livers. Dotted lines divide each liver into four vertical sections that are about the same size. In the first liver, cancer is shown in the two sections on the left. In the second liver, cancer is shown in the two sections on the right. In the third liver, cancer is shown in the far left and far right sections. In the fourth liver, cancer is shown in the second section from the left. In the fifth liver, cancer is shown in the second section from the right.

In group II, cancer is found in one or two sections of the liver. Two sections of the liver that are next to each other do not have cancer in them.

#### PRETEXT and POSTTEXT group III

Liver PRETEXT and POSTTEXT III. Cancer is found in three sections of the liver and one section does not have cancer in it, or cancer is found in two sections of the liver and two sections that are not next to each other do not have cancer in them.

Liver PRETEXT and POSTTEXT III; drawing shows seven livers. Dotted lines divide each liver into four vertical sections that are about the same size. In the first liver, cancer is shown in three sections on the left. In the second liver, cancer is shown in the two sections on the left and the section on the far right. In the third liver, cancer is shown in the section on the far left and the two sections on the right. In the fourth liver, cancer is shown in three sections on the right. In the fifth liver, cancer is shown in the two middle sections. In the sixth liver, cancer is shown in the section on the far left and in the second section from the right. In the seventh liver, cancer is shown in the section on the far right and in the second section from the left.

In group III, one of the following is true:

- Cancer is found in three sections of the liver, and one section does not have cancer.
- Cancer is found in two sections of the liver, and two sections that are not next to each other do not have cancer in them.

#### PRETEXT and POSTTEXT group IV

Liver PRETEXT and POSTTEXT IV. Cancer is found in all four sections of the liver.

Liver PRETEXT and POSTTEXT IV; drawing shows two livers. Dotted lines divide each liver into four vertical sections that are about the same size. In the first liver, cancer is shown across all four sections. In the second liver, cancer is shown in the two sections on the left and spots of cancer are shown in the two sections on the right.

In group IV, cancer is found in all four sections of the liver.

#### Progressive and recurrent childhood hepatocellular carcinoma

Childhood hepatocellular carcinoma can be a progressive disease or refractory disease. Progressive hepatocellular carcinoma is cancer that continues to grow, spread, or worsen. Refractory hepatocellular carcinoma is cancer that no longer responds to treatment.

Recurrent hepatocellular carcinoma is cancer that has recurred (come back) after it has been treated. The cancer may come back in the liver or in other parts of the body. Tests will be done to help determine where the cancer has returned in the body, if it has spread, and how far. The type of treatment that your child will have for recurrent hepatocellular carcinoma will depend on how far it has spread.

Learn more at Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer).

### Types of treatment for childhood hepatocellular carcinoma

There are different types of treatment for children and adolescents with hepatocellular carcinoma. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

A pediatric oncologist, a doctor who specializes in treating children with cancer, will oversee treatment of hepatocellular carcinoma. The pediatric oncologist works with other health care providers who are experts in treating children with hepatocellular carcinoma and who specialize in certain areas of medicine. It is especially important to have a pediatric surgeon with experience in liver surgery who can send patients to a liver transplant program if needed. Other specialists may include:

- pediatrician
- radiation oncologist
- pathologist
- pediatric nurse specialist
- rehabilitation specialist
- psychologist
- social worker
- nutritionist
- child-life specialist
- fertility specialist

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

#### Surgery

When possible, the cancer is removed by surgery. The types of surgery that may be done are:

- Partial hepatectomy is surgery to remove the part of the liver where cancer is found. The part removed may be a wedge of tissue, an entire lobe, or a larger part of the liver, along with a small amount of normal tissue around it.
- Liver transplant is the removal of the entire liver by surgery, followed by a transplant of a healthy liver from a donor. A liver transplant may be possible when cancer has not spread beyond the liver, and a donated liver can be found. If the patient has to wait for a donated liver, other treatment is given as needed.
- Resection of metastases is surgery to remove cancer that has spread outside of the liver, such as to nearby tissues, the lungs, or the brain.

The type of surgery that can be done depends on:

- the PRETEXT group and POSTTEXT group
- the size of the primary tumor
- whether there is more than one tumor in the liver
- whether the cancer has spread to nearby large blood vessels
- the level of AFP in the blood
- whether the tumor can be shrunk by chemotherapy so that it can be removed by surgery
- whether a liver transplant is needed

Chemotherapy is sometimes given before surgery to shrink the tumor and make it easier to remove. This is called neoadjuvant therapy.

After the doctor removes all the cancer that can be seen at the time of the surgery, some patients may be given chemotherapy or radiation therapy to kill any cancer cells that are left. Treatment given after the surgery to lower the risk that the cancer will come back is called adjuvant therapy.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment, such as radiation therapy.

There are two main ways to give chemotherapy to treat childhood hepatocellular carcinoma:

- Systemic chemotherapy is chemotherapy that is injected into a vein or muscle. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body.
- Regional chemotherapy is chemotherapy that is placed directly into the cerebrospinal fluid, an organ, or a body cavity such as the abdomen. When given this way, the drugs mainly affect cancer cells in those areas.
  Chemoembolization of the hepatic artery (the main artery that supplies blood to the liver) is a type of regional chemotherapy used to treat childhood hepatocellular carcinoma that cannot be removed by surgery. The anticancer drug is injected into the hepatic artery through a catheter (thin tube). The drug is mixed with a substance that blocks the artery, cutting off blood flow to the tumor. Most of the anticancer drug is trapped near the tumor, and only a small amount of the drug reaches other parts of the body. The blockage may be temporary or permanent, depending on the substance used to block the artery. The tumor is prevented from getting the oxygen and nutrients it needs to grow. The liver continues to receive blood from the hepatic portal vein, which carries blood from the stomach and intestine to the liver. This procedure is also called transarterial chemoembolization, or TACE.

Chemotherapy drugs used alone or in combination to treat childhood hepatocellular carcinoma include:

- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- fluorouracil (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil) (5-FU)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Hepatocellular carcinoma in children may be treated with internal radiation therapy. Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.

- Radioembolization is a type of internal radiation therapy used to treat childhood hepatocellular carcinoma. A very small amount of a radioactive substance is attached to tiny beads that are injected into the hepatic artery (the main artery that supplies blood to the liver) through a thin tube called a catheter. The beads are mixed with a substance that blocks the artery, cutting off blood flow to the tumor. Most of the radiation is trapped near the tumor to kill the cancer cells. This is done to shrink the tumor or to relieve symptoms and improve quality of life for children with hepatocellular carcinoma.

Learn more about radiation therapy and its side effects at Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Antiviral treatment

Hepatocellular carcinoma that is linked to the hepatitis B virus may be treated with antiviral drugs.

#### Ablation therapy

Ablation therapy removes or destroys tissue. Radiofrequency ablation is a type of ablation therapy that may be used to treat hepatocellular carcinoma. During radiofrequency ablation, special needles are inserted directly through the skin or through an incision in the abdomen to reach the tumor. High-energy radio waves heat the needles and tumor which kills cancer cells.

#### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of newly diagnosed childhood hepatocellular carcinoma

Treatment options for newly diagnosed hepatocellular carcinoma that can be removed by surgery at the time of diagnosis may include:

- surgery to remove the tumor, followed by chemotherapy
- combination chemotherapy, followed by surgery to remove the tumor
- surgery alone to remove the tumor

Treatment options for newly diagnosed hepatocellular carcinoma that cannot be removed by surgery and has not spread to other parts of the body at the time of diagnosis may include:

- chemotherapy to shrink the tumor, followed by surgery to completely remove the tumor
- chemotherapy to shrink the tumor

If surgery to completely remove the tumor is not possible, further treatment may include:

- liver transplant
- chemoembolization or radioembolization of the hepatic artery to shrink the tumor, followed by surgery to remove the tumor or liver transplant
- chemoembolization or radioembolization of the hepatic artery alone
- radioembolization of the hepatic artery as palliative therapy to relieve symptoms and improve the quality of life

Treatment for newly diagnosed hepatocellular carcinoma that has spread to other parts of the body at the time of diagnosis may include:

- Combination chemotherapy to shrink the tumor, followed by surgery to remove as much of the tumor as possible from the liver and other places where cancer has spread. Studies have shown that this treatment may not work well, but some patients may benefit.

Treatment options for newly diagnosed hepatocellular carcinoma related to hepatitis B virus infection may include:

- surgery to remove the tumor, followed by antiviral drugs that treat infection caused by the hepatitis B virus

### Treatment of progressive or recurrent childhood hepatocellular carcinoma

Treatment of progressive or recurrent hepatocellular carcinoma may include:

- chemoembolization of the hepatic artery to shrink the tumor before liver transplant
- radiofrequency ablation
- liver transplant

### Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

For information about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems that affect liver function or hearing
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the long-term effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer or to find out the treatment group may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back). To learn more about follow-up tests, visit Tests to diagnose childhood hepatocellular carcinoma (https://www.cancer.gov/types/liver/childhood-liver-cancer/hepatocellular-carcinoma#_16).

### Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Childhood Undifferentiated Embryonal Sarcoma of the Liver

Childhood undifferentiated embryonal sarcoma of the liver is a rare cancer that usually forms in the tissues of the right lobe of the liver. This type of liver cancer usually occurs in children between 5 and 10 years but can also occur in adolescence. It often spreads throughout the liver and/or to the lungs.

The liver is one of the largest organs in the body. It has two lobes and fills the upper right side of the abdomen inside the rib cage. Three of the many important functions of the liver include:

- to make bile to help digest fats from food
- to store glycogen (sugar), which the body uses for energy
- to filter harmful substances from the blood so they can be passed from the body in stools and urine

Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).

Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.

### Symptoms of childhood undifferentiated embryonal sarcoma of the liver

Children may not have symptoms of undifferentiated embryonal sarcoma of the liver until the tumor has grown bigger. It's important to check with your child's doctor if your child has:

- a lump in the abdomen
- abdominal pain
- weight loss for no known reason
- loss of appetite
- fatigue or loss of energy

These symptoms may be caused by problems other than undifferentiated embryonal sarcoma of the liver. The only way to know is to see your child's doctor.

### Tests to diagnose childhood undifferentiated embryonal sarcoma of the liver

If your child has symptoms that suggest undifferentiated embryonal sarcoma of the liver, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Based on these results, the doctor may recommend other tests. If your child is diagnosed with liver cancer, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose undifferentiated embryonal sarcoma of the liver may include:

#### Complete blood count (CBC)

A CBC checks a sample of blood for:

- the number of red blood cells, white blood cells, and platelets
- the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
- the portion of the blood sample made up of red blood cells

#### Liver function tests

Liver function tests measure the amounts of certain substances released into the blood by the liver. A higher-than-normal amount of a substance can be a sign of liver damage or cancer.

#### Blood chemistry studies

Blood chemistry studies measure the amounts of certain substances, such as bilirubin or lactate dehydrogenase (LDH), released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.

#### Magnetic resonance imaging (MRI) with gadolinium

MRI uses a magnet, radio waves, and a computer to take a series of detailed pictures of areas inside the liver. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. The procedure is also called nuclear MRI.

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

#### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.

A CT scan of the chest and abdomen is usually done to help diagnose childhood liver cancer.

Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

#### Ultrasound exam

An ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. An ultrasound exam of the abdomen to check the large blood vessels is usually done to help diagnose childhood liver cancer.

Abdominal ultrasound. An ultrasound transducer connected to a computer is pressed against the skin of the abdomen. The transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).

Abdominal ultrasound; drawing shows a child lying on an exam table during an abdominal ultrasound procedure. A technician is shown pressing a transducer (a device that makes sound waves that bounce off tissues inside the body) against the skin of the abdomen. A computer screen shows a sonogram (picture).

#### Chest x-ray

An x-ray is a type of high-energy radiation that can go through the body onto film, making a picture of areas inside the body. A chest x-ray is one that makes pictures of the lungs.

#### Biopsy

Biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for cancer. The doctor may remove as much tumor as safely possible during the same biopsy procedure.

#### Immunohistochemistry

Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type.

### Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, visit Questions to Ask Your Doctor (https://www.cancer.gov/about-cancer/coping/questions).

### Prognostic factors for childhood undifferentiated embryonal sarcoma of the liver

If your child has been diagnosed with undifferentiated embryonal sarcoma of the liver, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis for undifferentiated embryonal sarcoma of the liver depends on:

- the size of the tumor
- how the cancer responds to chemotherapy
- whether the cancer can be removed completely by surgery
- whether your child can have a liver transplant
- whether the cancer has spread to other places in the body, such as the lungs
- whether the cancer has just been diagnosed or has come back after treatment

For childhood undifferentiated embryonal sarcoma of the liver that comes back after initial treatment, the prognosis depends on:

- where in the body the tumor came back
- the type of treatment used to treat the initial cancer

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Types of treatment for childhood undifferentiated embryonal sarcoma of the liver

There are different types of treatment for children and adolescents with undifferentiated embryonal sarcoma of the liver. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

A pediatric oncologist, a doctor who specializes in treating children with cancer, will oversee treatment of undifferentiated embryonal sarcoma of the liver. The pediatric oncologist works with other health care providers who are experts in treating children with undifferentiated embryonal sarcoma of the liver and who specialize in certain areas of medicine. It is especially important to have a pediatric surgeon with experience in liver surgery who can send patients to a liver transplant program if needed. Other specialists may include:

- pediatrician
- radiation oncologist
- pathologist
- pediatric nurse specialist
- rehabilitation specialist
- psychologist
- social worker
- nutritionist
- child-life specialist

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

#### Surgery

When possible, the cancer is removed by surgery. The following types of surgery may be done:

- Partial hepatectomy is surgery to remove the part of the liver where cancer is found. The part removed may be a wedge of tissue, an entire lobe, or a larger part of the liver, along with some of the healthy tissue around it. The remaining liver tissue takes over the functions of the liver and may regrow.
- Liver transplant is the removal of the entire liver by surgery, followed by a transplant of a healthy liver from a donor. A liver transplant may be done when the cancer is in the liver only, and a donated liver can be found. If the patient has to wait for a donated liver, other treatment is given as needed.

Chemotherapy is sometimes given before surgery to shrink the tumor and make it easier to remove. This is called neoadjuvant therapy.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing.

For childhood undifferentiated embryonal sarcoma of the liver, the chemotherapy is injected into a vein. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body.

Chemotherapy drugs used alone or in combination to treat undifferentiated embryonal sarcoma of the liver in children include:

- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- dactinomycin (https://www.cancer.gov/about-cancer/treatment/drugs/dactinomycin)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

#### Treatment of childhood undifferentiated embryonal sarcoma of the liver

Treatment of newly diagnosed childhood undifferentiated embryonal sarcoma of the liver may include:

- surgery to remove the tumor
- chemotherapy before surgery, after surgery, or both
- liver transplant if surgery to remove the tumor is not possible

If the first surgery is unable to remove the entire tumor, a second surgery may be done to remove the remaining tumor cells.

Sometimes childhood undifferentiated embryonal sarcoma of the liver continues to grow or recurs (comes back) after treatment. The cancer may come back in the liver or in other parts of the body. Your child's doctor will work with you to plan treatment if your child is diagnosed with recurrent undifferentiated embryonal sarcoma of the liver.

### Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the long-term effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer or to find out the treatment group may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has come back. To learn more about follow-up tests, visit Tests to diagnose childhood undifferentiated embryonal sarcoma of the liver (https://www.cancer.gov/types/liver/childhood-liver-cancer/undifferentiated-embryonal-sarcoma#_9).

### Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Infantile Choriocarcinoma of the Liver

Infantile choriocarcinoma of the liver is a very rare type of cancer that starts in the placenta and spreads to the fetus. The tumor is usually found during the first few months after the baby is born.

The liver is one of the largest organs in the body. It has two lobes and fills the upper right side of the abdomen inside the rib cage. Three of the many important functions of the liver are:

- to make bile to help digest fats from food
- to store glycogen (sugar), which the body uses for energy
- to filter harmful substances from the blood so they can be passed from the body in stools and urine

Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).

Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.

The mother of the child may also be diagnosed with choriocarcinoma. For more information on the treatment of choriocarcinoma in the mother, visit Gestational Trophoblastic Disease Treatment.

### Symptoms of infantile choriocarcinoma of the liver

Children may not have symptoms of infantile choriocarcinoma of the liver until the tumor has grown bigger. It's important to check with your child's doctor if your child has:

- a lump in the abdomen
- swelling in the abdomen
- hemorrhage
- weakness or increased sleeping
- paleness (loss of normal color from the skin or inside of the nose and mouth)
- shortness of breath
- signs of puberty
- slow growth, poor eating, or is not meeting developmental milestones

These symptoms may be caused by problems other than infantile choriocarcinoma of the liver. The only way to know is to see your child's doctor.

### Tests to diagnose infantile choriocarcinoma of the liver

If your child has symptoms that suggest infantile choriocarcinoma of the liver, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Based on these results, the doctor may recommend other tests. If your child is diagnosed with liver cancer, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose infantile choriocarcinoma of the liver may include:

#### Serum tumor marker test

Serum tumor marker tests measure the amounts of certain substances released into the blood by organs, tissues, or tumor cells in the body. Certain substances are linked to specific types of cancer when found in increased levels in the blood. These are called tumor markers. The blood of children who have liver cancer may have increased amounts of a hormone called beta-human chorionic gonadotropin (beta-hCG) or a protein called alpha-fetoprotein (AFP). Other cancers, benign liver tumors, and certain noncancer conditions, including cirrhosis and hepatitis, can also increase AFP levels.

#### Complete blood count (CBC)

A CBC checks a sample of blood for:

- the number of red blood cells, white blood cells, and platelets
- the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
- the portion of the blood sample made up of red blood cells

#### Liver function tests

Liver function tests measure the amounts of certain substances released into the blood by the liver. A higher-than-normal amount of a substance can be a sign of liver damage or cancer.

#### Blood chemistry studies

Blood chemistry studies measure the amounts of certain substances, such as bilirubin or lactate dehydrogenase (LDH), released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.

#### Magnetic resonance imaging (MRI) with gadolinium

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the liver. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear MRI.

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

#### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.

A CT scan of the chest and abdomen is usually done to help diagnose childhood liver cancer.

Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

#### Ultrasound exam

An ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. An ultrasound exam of the abdomen to check the large blood vessels is usually done to help diagnose childhood liver cancer.

Abdominal ultrasound. An ultrasound transducer connected to a computer is pressed against the skin of the abdomen. The transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).

Abdominal ultrasound; drawing shows a child lying on an exam table during an abdominal ultrasound procedure. A technician is shown pressing a transducer (a device that makes sound waves that bounce off tissues inside the body) against the skin of the abdomen. A computer screen shows a sonogram (picture).

#### Chest x-ray

An x-ray is a type of high-energy radiation that can go through the body onto film, making a picture of areas inside the body. A chest x-ray is one that makes pictures of the lungs.

#### Immunohistochemistry

Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type.

### Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans before giving a recommendation. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, visit Questions to Ask Your Doctor (https://www.cancer.gov/about-cancer/coping/questions).

### Prognostic factors for infantile choriocarcinoma of the liver

If your child has been diagnosed with infantile choriocarcinoma of the liver, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis for infantile choriocarcinoma of the liver depends on:

- the size of the tumor
- your child's health
- how the cancer responds to chemotherapy
- whether the cancer can be removed completely by surgery
- whether your child can have a liver transplant
- whether the cancer has just been diagnosed or has come back

For infantile choriocarcinoma of the liver that comes back after initial treatment, the prognosis depends on:

- where in the body the tumor recurred
- the type of treatment used to treat the initial cancer

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Types of treatment for infantile choriocarcinoma of the liver

There are different types of treatment for children with infantile choriocarcinoma of the liver. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

A pediatric oncologist, a doctor who specializes in treating children with cancer, will oversee treatment of infantile choriocarcinoma of the liver. The pediatric oncologist works with other health care providers who are experts in treating children with infantile choriocarcinoma of the liver and who specialize in certain areas of medicine. It is especially important to have a pediatric surgeon with experience in liver surgery who can send patients to a liver transplant program if needed. Other specialists may include:

- pediatrician
- radiation oncologist
- pathologist
- pediatric nurse specialist
- rehabilitation specialist
- psychologist
- social worker
- nutritionist
- child-life specialist

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

#### Surgery

When possible, the cancer is removed by surgery. The types of surgery that may be done are:

- Partial hepatectomy is surgery to remove the part of the liver where cancer is found. The part removed may be a wedge of tissue, an entire lobe, or a larger part of the liver, along with some of the healthy tissue around it. The remaining liver tissue takes over the functions of the liver and may regrow.
- Liver transplant is the removal of the entire liver by surgery, followed by a transplant of a healthy liver from a donor. A liver transplant may be done when the cancer is in the liver only, and a donated liver can be found. If the patient has to wait for a donated liver, other treatment is given as needed.

Chemotherapy is sometimes given before surgery to shrink the tumor and make it easier to remove. This is called neoadjuvant therapy.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment.

For infantile choriocarcinoma of the liver, the chemotherapy is injected into a vein. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body.

Chemotherapy drugs used alone or in combination to treat infantile choriocarcinoma of the liver include:

- bleomycin (https://www.cancer.gov/about-cancer/treatment/drugs/bleomycin)
- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

#### Treatment of infantile choriocarcinoma of the liver

Treatment of newly diagnosed infantile choriocarcinoma of the liver may include:

- chemotherapy to help shrink the tumor, followed by surgery to remove the tumor
- surgery to remove the tumor, followed by chemotherapy
- chemotherapy, followed by liver transplant if surgery to remove the tumor is not possible

Sometimes infantile choriocarcinoma of the liver continues to grow or recurs (comes back) after treatment. The cancer may come back in the liver or in other parts of the body. Your child's doctor will work with you to plan treatment if your child is diagnosed with recurrent infantile choriocarcinoma of the liver.

### Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems that affect hearing
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the long-term effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer or to find out the treatment group may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has come back. To learn more about follow-up tests, visit Tests to diagnose infantile choriocarcinoma of the liver (https://www.cancer.gov/types/liver/childhood-liver-cancer/infantile-choriocarcinoma#_10).

### Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).